# Renal Cell Cancer Treatment (PDQ®)

Patient Version

This PDQ cancer information summary has current information about the treatment of renal cancer. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Date Last Modified") is the date of the most recent change. The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Adult Treatment Editorial Board.

## General Information About Renal Cell Cancer

Key Points for This Section
- Renal cell cancer is a type of cancer that forms in tubules of the kidney.
- Smoking and misuse of certain pain medicines can affect the risk of renal cell cancer.
- Signs of renal cell cancer include blood in the urine and a lump in the abdomen.
- Tests that examine the abdomen and kidneys are used to diagnose renal cell cancer.
- After renal cell cancer has been diagnosed, tests are done to find out if cancer cells have spread within the kidney or to other parts of the body.
- Certain factors affect prognosis (chance of recovery) and treatment options.

### Renal cell cancer is a type of cancer that forms in tubules of the kidney.

Renal cell cancer (also called renal cell adenocarcinoma) is a disease in which cancer cells are found in the lining of tubules (very small tubes) in the kidney. It is the most common type of kidney cancer in adults. There are two kidneys, one on each side of the backbone, above the waist. Tiny tubules in the kidneys filter and clean the blood. They take out waste products and make urine. The urine passes from each kidney through a long tube called a ureter into the bladder. The bladder holds the urine until it passes through the urethra and leaves the body.

Anatomy of the male urinary system (left panel) and female urinary system (right panel) showing the kidneys, ureters, bladder, and urethra. The inside of the left kidney shows the renal pelvis. An inset shows the renal tubules and urine. Also shown are the prostate and penis (left panel) and the uterus (right panel). Urine is made in the renal tubules and collects in the renal pelvis of each kidney. The urine flows from the kidneys through the ureters to the bladder. The urine is stored in the bladder until it leaves the body through the urethra.

Anatomy of the male urinary system (left panel) and female urinary system (right panel); two-panel drawing showing the right and left kidneys, the ureters, the bladder filled with urine, and the urethra. The inside of the left kidney shows the renal pelvis. An inset shows the renal tubules and urine. Also shown are the prostate and penis (left panel) and the uterus (right panel).

Cancer that starts in the ureters or the renal pelvis (the part of the kidney that collects urine and drains it to the ureters) is different from renal cell cancer. For more information, visit Transitional Cell Cancer of the Renal Pelvis and Ureter Treatment.

### Smoking and misuse of certain pain medicines can affect the risk of renal cell cancer.

Renal cell cancer is caused by certain changes to the way renal cells function, especially how they grow and divide into new cells. There are many risk factors for renal cell cancer, but many do not directly cause cancer. Instead, they increase the chance of DNA damage in cells that may lead to renal cell cancer. Learn more about how cancer develops at What Is Cancer? (https://www.cancer.gov/about-cancer/understanding/what-is-cancer)

A risk factor is anything that increases the chance of getting a disease. Some risk factors for renal cell cancer, like smoking, can be changed. However, risk factors also include things you cannot change, like your genetics, getting older, and your family history. Learning about risk factors for renal cell cancer can help you make changes that might lower your risk of getting it.

Risk factors for renal cell cancer include:

- smoking tobacco
- misusing certain pain medicines, including over-the-counter pain medicines, for a long time
- having excess body weight
- having high blood pressure
- having a family history of renal cell cancer
- having certain genetic conditions, such as von Hippel-Lindau disease or hereditary papillary renal cancer

Tobacco use is a leading cause of cancer and death from cancer. Learn more about Tobacco (https://www.cancer.gov/about-cancer/causes-prevention/risk/tobacco) (includes help with quitting).

Having one or more of these risk factors does not mean you will get renal cell cancer. Many people with risk factors never develop renal cell cancer, while others with no known risk factors do. Talk with your doctor if you think you may be at risk.

### Signs of renal cell cancer include blood in the urine and a lump in the abdomen.

These and other signs and symptoms may be caused by renal cell cancer or by other conditions. There may be no signs or symptoms in the early stages. Signs and symptoms may appear as the tumor grows. Check with your doctor if you have:

- blood in the urine
- a lump in the abdomen
- a pain in the side that doesn't go away
- loss of appetite
- weight loss for no known reason
- anemia

### Tests that examine the abdomen and kidneys are used to diagnose renal cell cancer.

In addition to asking about your personal and family health history and doing a physical exam, your doctor may perform the following tests and procedures:

- Ultrasound exam uses high-energy sound waves (ultrasound) that bounce off internal tissues or organs and make echoes. The echoes form a picture of body tissues called a sonogram.
- Blood chemistry study uses a blood sample to measure the amounts of certain substances released into the blood by organs and tissues in the body. An unusual (higher or lower than normal) amount of a substance can be a sign of disease.
- Urinalysis checks the color of urine and its contents, such as sugar, protein, red blood cells, and white blood cells.
- CT scan (CAT scan) uses a computer linked to an x-ray machine to make a series of detailed pictures of areas inside the body, such as the abdomen and pelvis. The pictures are taken from different angles and are used to create 3-D views of tissues and organs. A dye may be injected into a vein or swallowed to help the organs or tissues show up more clearly. This procedure is also called computed tomography, computerized tomography, or computerized axial tomography.
- MRI (magnetic resonance imaging) uses a magnet, radio waves, and a computer to make a series of detailed pictures of areas inside the body. This procedure is also called nuclear magnetic resonance imaging (NMRI).
- Biopsy is the removal of cells or tissues so they can be viewed under a microscope by a pathologist to check for signs of cancer. To do a biopsy for renal cell cancer, a thin needle is inserted into the tumor and a sample of tissue is withdrawn. A biopsy may not be needed if the imaging test results provide enough information to make a diagnosis.

### After renal cell cancer has been diagnosed, tests are done to find out if cancer cells have spread within the kidney or to other parts of the body.

The process used to find out if cancer has spread within the kidney or to other parts of the body is called staging. The information gathered from the staging process determines the stage of the disease. It is important to know the stage in order to plan treatment.

Some of the tests and procedures used to diagnose liver cancer, such as CT scan and MRI, may be used in the staging process. Other tests include:

- Chest x-ray is a type of radiation that can go through the body and make pictures of organs and bones inside the chest.
- Bone scan is a procedure to check if there are rapidly dividing cells, such as cancer cells, in the bone. A very small amount of radioactive material is injected into a vein and travels through the bloodstream. The radioactive material collects in the bones with cancer and is detected by a scanner.

### Some people decide to get a second opinion.

You may want to get a second opinion to confirm your renal cell cancer diagnosis and treatment plan. If you seek a second opinion, you will need to get medical test results and reports from the first doctor to share with the second doctor. The second doctor will review the pathology report, slides, and scans. They may agree with the first doctor, suggest changes or another treatment approach, or provide more information about your cancer.

To learn more about choosing a doctor and getting a second opinion, see Finding Cancer Care (https://www.cancer.gov/about-cancer/managing-care/finding-cancer-care). You can contact NCI's Cancer Information Service (https://www.cancer.gov/contact) via chat, email, or phone (both in English and Spanish) for help finding a doctor, hospital, or getting a second opinion. For questions you might want to ask at your appointments, see Questions to Ask Your Doctor About Cancer (https://www.cancer.gov/about-cancer/coping/questions).

### Certain factors affect prognosis (chance of recovery) and treatment options.

The prognosis and treatment options depend on:

- the stage of the disease
- your age and general health

## Stages of Renal Cell Cancer

Key Points for This Section
- The following stages are used for renal cell cancer:
  - Stage I (also called stage 1) renal cell cancer
  - Stage II (also called stage 2) renal cell cancer
  - Stage III (also called stage 3) renal cell cancer
  - Stage IV (also called stage 4) renal cell cancer
- Renal cell cancer can recur (come back) many years after initial treatment.

Cancer stage describes the extent of cancer in the body, such as the size of the tumor, whether it has spread, and how far it has spread from where it first formed.

There are several staging systems for cancer that describe the extent of the cancer. Renal cell cancer staging usually uses the TNM staging system. The cancer may be described by this staging system in your pathology report. Based on the TNM results, a stage (I, II, III, or IV, also written as 1, 2, 3, or 4) is assigned to your cancer. When talking to you about your diagnosis, your doctor may describe the cancer as one of these stages.

Learn about tests to stage renal cell cancer. Learn more about Cancer Staging (https://www.cancer.gov/about-cancer/diagnosis-staging/staging).

### The following stages are used for renal cell cancer:

#### Stage I (also called stage 1) renal cell cancer

Stage I kidney cancer. The tumor is 7 centimeters or smaller and is found in the kidney only.

Stage I kidney cancer; drawing shows cancer in the left kidney and the tumor is 7 centimeters or smaller. An inset shows 7 centimeters is about the size of a peach. Also shown are fatty tissue and the right kidney.

In stage I, the tumor is 7 centimeters or smaller and is found in the kidney only.

#### Stage II (also called stage 2) renal cell cancer

Stage II kidney cancer. The tumor is larger than 7 centimeters and is found in the kidney only.

Stage II kidney cancer; drawing shows cancer in the left kidney and the tumor is larger than 7 centimeters. An inset shows 7 centimeters is about the size of a peach. Also shown are the fatty tissue and right kidney.

In stage II, the tumor is larger than 7 centimeters and is found in the kidney only.

#### Stage III (also called stage 3) renal cell cancer

Stage III kidney cancer. The cancer in the kidney is any size and cancer has spread to a) nearby lymph nodes, b) the blood vessels in or near the kidney (renal vein or vena cava), c) the structures in the kidney that collect urine, or d) the layer of fatty tissue around the kidney.

Stage III kidney cancer; drawing shows cancer in the left kidney and in a) nearby lymph nodes, b) the renal vein, c) the structures in the kidney that collect urine, and d) the layer of fatty tissue around the kidney. Also shown are the right kidney, the right and left adrenal glands, and the vena cava.

In stage III, one of the following is found:

- the cancer in the kidney is any size, and cancer has spread to nearby lymph nodes; or
- cancer has spread to blood vessels in or near the kidney (renal vein or vena cava), to the fat around the structures in the kidney that collect urine, or to the layer of fatty tissue around the kidney and may have spread to nearby lymph nodes.

#### Stage IV (also called stage 4) renal cell cancer

Stage IV kidney cancer. Cancer has spread a) beyond the layer of fatty tissue around the kidney and may have spread into the adrenal gland above the kidney with cancer or to nearby lymph nodes, or b) to other parts of the body, such as the brain, lung, liver, adrenal gland, bone, or distant lymph nodes.

Stage IV kidney cancer; drawing shows cancer that has spread beyond the layer of fatty tissue around the left kidney to a) the adrenal gland above the left kidney. Also shown are the lymph nodes, right adrenal gland, and right kidney. An inset shows b) other parts of the body where kidney cancer may spread, including the brain, lung, liver, adrenal gland, bone, and distant lymph nodes.

In stage IV, one of the following is found:

- cancer has spread beyond the layer of fatty tissue around the kidney and may have spread into the adrenal gland above the kidney with cancer or to nearby lymph nodes; or
- cancer has spread to other parts of the body, such as the bones, liver, lungs, brain, adrenal glands, or distant lymph nodes.

Stage IV renal cell cancer is also called metastatic renal cell cancer. Metastatic cancer happens when cancer cells travel through the lymphatic system or blood and form tumors in other parts of the body. The metastatic tumor is the same type of cancer as the primary tumor. For example, if renal cell cancer spreads to the liver, the cancer cells in the liver are actually renal cell cancer. The disease is called metastatic renal cell cancer, not liver cancer. Learn more in Metastatic Cancer: When Cancer Spreads (https://www.cancer.gov/types/metastatic-cancer).

### Renal cell cancer can recur (come back) many years after initial treatment.

Recurrent renal cell cancer is cancer that has come back after it has been treated. If renal cell cancer comes back, it may come back in the kidney or in other parts of the body. Tests will be done to help determine where the cancer has returned. The type of treatment for recurrent renal cell cancer will depend on where it has come back.

Learn more in Recurrent Cancer: When Cancer Comes Back (https://www.cancer.gov/types/recurrent-cancer). Information to help you cope and talk with your health care team can be found in the booklet When Cancer Returns (https://www.cancer.gov/publications/patient-education/when-cancer-returns).

## Treatment Option Overview for Renal Cell Cancer

Key Points for This Section
- There are different types of treatment for people with renal cell cancer.
- The following types of treatment are used:
  - Surgery
  - Radiation therapy
  - Immunotherapy
  - Targeted therapy
- New types of treatment are being tested in clinical trials.
- Treatment for renal cell cancer may cause side effects.
- Follow-up care may be needed.

### There are different types of treatment for people with renal cell cancer.

Different types of treatments are available for people with renal cell cancer. You and your cancer care team will work together to decide your treatment plan, which may include more than one type of treatment. Many factors will be considered, such as the stage of the cancer, your overall health, and your preferences. Your plan will include information about your cancer, the goals of treatment, your treatment options and the possible side effects, and the expected length of treatment.

Talking with your cancer care team before treatment begins about what to expect will be helpful. You'll want to learn what you need to do before treatment begins, how you'll feel while going through it, and what kind of help you will need. To learn more, see Questions to Ask Your Doctor About Treatment (https://www.cancer.gov/about-cancer/treatment/questions).

### The following types of treatment are used:

#### Surgery

Surgery to remove part or all of the kidney is often used to treat renal cell cancer. The following types of surgery may be used:

- Partial nephrectomy is surgery to remove the cancer within the kidney and some of the tissue around it. A partial nephrectomy may be done to prevent loss of kidney function when the other kidney is damaged or has already been removed.
- Simple nephrectomy is surgery to remove the kidney only.
- Radical nephrectomy is surgery to remove the kidney, the adrenal gland, surrounding tissue, and usually nearby lymph nodes.

A person can live with part of one working kidney, but if both kidneys are removed or not working, the person will need dialysis (a procedure to clean the blood using a machine outside of the body) or a kidney transplant (replacement with a healthy donated kidney). A kidney transplant may be done when the disease is in the kidney only and a donated kidney can be found. If the person has to wait for a donated kidney, other treatment is given as needed.

After the doctor removes all the cancer that can be seen at the time of the surgery, some people may receive radiation therapy to kill any cancer cells that are left. Treatment given after surgery to lower the risk that the cancer will come back is called adjuvant therapy.

When surgery to remove the cancer is not possible, other procedures might be done:

- Arterial embolization may be used to shrink the tumor. A small incision (cut) is made, and a catheter (thin tube) is inserted into the main blood vessel that flows to the kidney. Small pieces of a special gelatin sponge are injected through the catheter into the blood vessel. The sponges block the blood flow to the kidney and prevent the cancer cells from getting oxygen and other substances they need to grow.
- Cryosurgery uses an instrument to freeze and destroy abnormal tissue. This type of treatment is also called cryotherapy. Learn more about Cryosurgery to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/surgery/cryosurgery).
- Thermal ablation (also called hyperthermia) uses heat to destroy abnormal tissue. Learn more about Hyperthermia to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/hyperthermia).

#### Radiation therapy

Radiation therapy uses high-energy x-rays or other types of radiation to kill cancer cells or keep them from growing. External beam radiation therapy uses a machine outside the body to send radiation toward the area of the body with cancer. External beam radiation therapy is used to treat renal cell cancer, and may also be used as palliative therapy to relieve symptoms and improve quality of life. A specific way to give radiation therapy called stereotactic ablative body radiation therapy, or stereotactic radiosurgery, may be used in some cases.

Learn more about External Beam Radiation Therapy for Cancer (https://www.cancer.gov/about-cancer/treatment/types/radiation-therapy/external-beam) and Radiation Therapy Side Effects (https://www.cancer.gov/about-cancer/treatment/types/radiation-therapy/side-effects).

#### Immunotherapy

Immunotherapy helps a person's immune system fight cancer. Your doctor may suggest biomarker tests to help predict your response to certain immunotherapy drugs. Learn more about Biomarker Testing for Cancer Treatment (https://www.cancer.gov/about-cancer/treatment/types/biomarker-testing-cancer-treatment).

Immunotherapy drugs used to treat renal cell cancer include:

- avelumab (https://www.cancer.gov/about-cancer/treatment/drugs/avelumab)
- interferon
- interleukin-2
- ipilimumab (https://www.cancer.gov/about-cancer/treatment/drugs/ipilimumab)
- nivolumab (https://www.cancer.gov/about-cancer/treatment/drugs/nivolumab)
- pembrolizumab (https://www.cancer.gov/about-cancer/treatment/drugs/pembrolizumab)

Learn more about Immunotherapy to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/immunotherapy).

#### Targeted therapy

Targeted therapy uses drugs or other substances to identify and attack specific cancer cells. Your doctor may suggest biomarker tests to help predict your response to certain targeted therapy drugs. Learn more about Biomarker Testing for Cancer Treatment (https://www.cancer.gov/about-cancer/treatment/types/biomarker-testing-cancer-treatment).

Targeted therapies used to treat renal cell cancer include:

- axitinib (https://www.cancer.gov/about-cancer/treatment/drugs/axitinib)
- bevacizumab (https://www.cancer.gov/about-cancer/treatment/drugs/bevacizumab)
- cabozantinib (https://www.cancer.gov/about-cancer/treatment/drugs/cabozantinib-s-malate)
- everolimus (https://www.cancer.gov/about-cancer/treatment/drugs/everolimus)
- lenvatinib (https://www.cancer.gov/about-cancer/treatment/drugs/lenvatinibmesylate)
- pazopanib (https://www.cancer.gov/about-cancer/treatment/drugs/pazopanibhydrochloride)
- sorafenib (https://www.cancer.gov/about-cancer/treatment/drugs/sorafenibtosylate)
- sunitinib (https://www.cancer.gov/about-cancer/treatment/drugs/sunitinibmalate)
- temsirolimus (https://www.cancer.gov/about-cancer/treatment/drugs/temsirolimus)
- tivozanib (https://www.cancer.gov/about-cancer/treatment/drugs/tivozanibhydrochloride)

Learn more about Targeted Therapy to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/targeted-therapies).

### New types of treatment are being tested in clinical trials.

For some people, joining a clinical trial may be an option. There are different types of clinical trials for people with cancer. For example, a treatment trial tests new treatments or new ways of using current treatments. Supportive care and palliative care trials look at ways to improve quality of life, especially for those who have side effects from cancer and its treatment.

You can use the clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials accepting participants. The search allows you to filter trials based on the type of cancer, your age, and where the trials are being done. Clinical trials supported by other organizations can be found on the ClinicalTrials.gov website.

Learn more about clinical trials, including how to find and join one, at Clinical Trials Information for Patients and Caregivers (https://www.cancer.gov/research/participate/clinical-trials).

### Treatment for renal cell cancer may cause side effects.

For information about side effects caused by treatment for cancer, visit our Side Effects (https://www.cancer.gov/about-cancer/treatment/side-effects) page.

### Follow-up care may be needed.

As you go through treatment, you will have follow-up tests or check-ups. Some tests that were done to diagnose or stage the cancer may be repeated to see how well the treatment is working. Decisions about whether to continue, change, or stop treatment may be based on the results of these tests.

Some of the tests will continue to be done from time to time after treatment has ended. The results of these tests can show if your condition has changed or if the cancer has recurred (come back).

After treatment for renal cell cancer, a blood test to measure amounts of carcinoembryonic antigen (a substance in the blood that may be increased when cancer is present) may be done to see if the cancer has come back.

## Treatment of Stage I Renal Cell Cancer

The main treatment for stage I renal cell cancer is surgery:

- partial nephrectomy
- simple nephrectomy
- radical nephrectomy

If surgery isn't an option, treatment options may include:

- cryotherapy
- thermal ablation
- stereotactic ablative body radiation therapy (a type of external beam radiation therapy)

If none of these treatments is an option, palliative therapy aimed at relieving symptoms may include:

- external beam radiation therapy
- arterial embolization

Learn more about these treatments in the Treatment Option Overview.

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

## Treatment of Stage II Renal Cell Cancer

Treatment of stage II renal cell cancer may include:

- partial nephrectomy
- radical nephrectomy
- radical nephrectomy followed by pembrolizumab (https://www.cancer.gov/about-cancer/treatment/drugs/pembrolizumab), for cancer that is at high risk of coming back
- nephrectomy before or after external beam radiation therapy
- external beam radiation therapy or arterial embolization as palliative therapy to relieve symptoms, if surgery isn't an option

Learn more about these treatments in the Treatment Option Overview.

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

## Treatment of Stage III Renal Cell Cancer

Treatment of stage III renal cell cancer may include:

- radical nephrectomy
- arterial embolization to reduce blood loss during surgery followed by radical nephrectomy
- radical nephrectomy followed by pembrolizumab (https://www.cancer.gov/about-cancer/treatment/drugs/pembrolizumab) or sunitinib (https://www.cancer.gov/about-cancer/treatment/drugs/sunitinibmalate)
- external beam radiation therapy or arterial embolization as palliative therapy to relieve symptoms and improve the quality of life
- external beam radiation therapy before or after surgery (radical nephrectomy), for certain people with more extensive tumors

Learn more about these treatments in the Treatment Option Overview.

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

## Treatment of Stage IV and Recurrent Renal Cell Cancer

First-line treatment of stage IV renal cell cancer may include:

- ipilimumab (https://www.cancer.gov/about-cancer/treatment/drugs/ipilimumab) plus nivolumab (https://www.cancer.gov/about-cancer/treatment/drugs/nivolumab)
- pembrolizumab (https://www.cancer.gov/about-cancer/treatment/drugs/pembrolizumab) plus axitinib (https://www.cancer.gov/about-cancer/treatment/drugs/axitinib)
- pembrolizumab plus lenvatinib (https://www.cancer.gov/about-cancer/treatment/drugs/lenvatinibmesylate)
- nivolumab plus cabozantinib (https://www.cancer.gov/about-cancer/treatment/drugs/cabozantinib-s-malate)
- radical nephrectomy
- nephrectomy to reduce the size of the tumor in people with certain favorable tumor types
- cabozanitnib
- avelumab (https://www.cancer.gov/about-cancer/treatment/drugs/avelumab) plus axitinib
- sunitinib (https://www.cancer.gov/about-cancer/treatment/drugs/sunitinibmalate)
- pazopanib (https://www.cancer.gov/about-cancer/treatment/drugs/pazopanibhydrochloride)
- sorafenib (https://www.cancer.gov/about-cancer/treatment/drugs/sorafenibtosylate)
- temsirolimus (https://www.cancer.gov/about-cancer/treatment/drugs/temsirolimus)
- bevacizumab (https://www.cancer.gov/about-cancer/treatment/drugs/bevacizumab) with or without interferon
- interferon
- interleukin-2
- palliative radiation therapy

Second-line treatment may include:

- nivolumab (for people previously treated with sunitinib, pazopanib, sorafenib, and/or axitinib)
- lenvatinib plus everolimus (https://www.cancer.gov/about-cancer/treatment/drugs/everolimus) (for people previously treated with sunitinib, pazopanib, cabozantinib, axitinib, or sorafenib)
- cabozantinib (for people previously treated with sunitinib, pazopanib, sorafenib, or axitinib)
- axitinib
- everolimus (for people previously treated with sunitinib and/or sorafenib)
- sorafenib
- palliative radiation therapy

Third-line and fourth-line treatment may include:

- tivozanib (https://www.cancer.gov/about-cancer/treatment/drugs/tivozanibhydrochloride) for people who have had at least two other types of systemic treatments
- any of the treatments listed for first-line or second-line therapy

Learn more about these treatments in the Treatment Option Overview.

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

## To Learn More About Renal Cell Cancer

For more information from the National Cancer Institute about renal cell cancer, visit:

- Kidney Cancer Home Page (https://www.cancer.gov/types/kidney)
- Drugs Approved for Kidney (Renal Cell) Cancer (https://www.cancer.gov/about-cancer/treatment/drugs/kidney)
- Angiogenesis Inhibitors (https://www.cancer.gov/about-cancer/treatment/types/immunotherapy/angiogenesis-inhibitors-fact-sheet)
- Genetic Testing for Inherited Cancer Risk (https://www.cancer.gov/about-cancer/causes-prevention/genetics/genetic-testing-fact-sheet)

For general cancer information and other resources from the National Cancer Institute, visit:

- About Cancer (https://www.cancer.gov/about-cancer)
- Cancer Staging (https://www.cancer.gov/about-cancer/diagnosis-staging/staging)
- Chemotherapy and You: Support for People With Cancer (https://www.cancer.gov/publications/patient-education/chemo-and-you)
- Radiation Therapy and You: Support for People With Cancer (https://www.cancer.gov/publications/patient-education/radiation-therapy-and-you)
- Coping with Cancer (https://www.cancer.gov/about-cancer/coping)
- Questions to Ask Your Doctor about Cancer (https://www.cancer.gov/about-cancer/coping/questions)
- For Survivors, Caregivers, and Advocates (https://cancercontrol.cancer.gov/ocs/resources/survivors.html)

## About This PDQ Summary

### About PDQ

Physician Data Query (PDQ) is the National Cancer Institute's (NCI's) comprehensive cancer information database. The PDQ database contains summaries of the latest published information on cancer prevention, detection, genetics, treatment, supportive care, and complementary and alternative medicine. Most summaries come in two versions. The health professional versions have detailed information written in technical language. The patient versions are written in easy-to-understand, nontechnical language. Both versions have cancer information that is accurate and up to date and most versions are also available in Spanish (https://www.cancer.gov/espanol/publicaciones/pdq).

PDQ is a service of the NCI. The NCI is part of the National Institutes of Health (NIH). NIH is the federal government’s center of biomedical research. The PDQ summaries are based on an independent review of the medical literature. They are not policy statements of the NCI or the NIH.

### Purpose of This Summary

This PDQ cancer information summary has current information about the treatment of renal cancer. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

### Reviewers and Updates

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Updated") is the date of the most recent change.

The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Adult Treatment Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/adult-treatment).

### Clinical Trial Information

A clinical trial is a study to answer a scientific question, such as whether one treatment is better than another. Trials are based on past studies and what has been learned in the laboratory. Each trial answers certain scientific questions in order to find new and better ways to help cancer patients. During treatment clinical trials, information is collected about the effects of a new treatment and how well it works. If a clinical trial shows that a new treatment is better than one currently being used, the new treatment may become "standard." Patients may want to think about taking part in a clinical trial. Some clinical trials are open only to patients who have not started treatment.

Clinical trials can be found online at NCI's website (https://www.cancer.gov/research/participate/clinical-trials). For more information, call the Cancer Information Service (https://www.cancer.gov/contact/contact-center) (CIS), NCI's contact center, at 1-800-4-CANCER (1-800-422-6237).

### Permission to Use This Summary

PDQ is a registered trademark. The content of PDQ documents can be used freely as text. It cannot be identified as an NCI PDQ cancer information summary unless the whole summary is shown and it is updated regularly. However, a user would be allowed to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks in the following way: [include excerpt from the summary].”

The best way to cite this PDQ summary is:

PDQ® Adult Treatment Editorial Board. PDQ Renal Cell Cancer Treatment. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/types/kidney/patient/kidney-treatment-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389448]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use in the PDQ summaries only. If you want to use an image from a PDQ summary and you are not using the whole summary, you must get permission from the owner. It cannot be given by the National Cancer Institute. Information about using the images in this summary, along with many other images related to cancer can be found in Visuals Online (https://visualsonline.cancer.gov/). Visuals Online is a collection of more than 3,000 scientific images.

### Disclaimer

The information in these summaries should not be used to make decisions about insurance reimbursement. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s E-mail Us (https://www.cancer.gov/contact/email-us).